# Childhood Salivary Gland Tumors (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood salivary gland tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What are salivary gland tumors?

Salivary gland tumors are abnormal growths that can form in the salivary glands. They can be benign (not cancer) or malignant (cancerous). Although benign tumors do not spread to other parts of the body, they may require treatment to stop them from continuing to grow and press on nearby tissue. Cancerous tumors can spread to other areas of the body and will be treated to kill the cancer cells. Salivary gland tumors rarely occur in children.

The salivary glands make saliva and release it into the mouth. Saliva has enzymes that help digest food and antibodies that help protect against mouth and throat infections. There are three pairs of major salivary glands:

- Parotid glands are the largest glands and are found in front of and just below each ear. Most salivary gland tumors begin in this gland.
- Sublingual glands are found under the tongue in the floor of the mouth.
- Submandibular glands are found below the jawbone.

Anatomy of the salivary glands. The three main pairs of salivary glands are the parotid glands, the sublingual glands, and the submandibular glands.

Anatomy of the salivary glands; drawing shows a cross section of the head and the three main pairs of salivary glands. The parotid glands are in front of and just below each ear; the sublingual glands are under the tongue in the floor of the mouth; and the submandibular glands are below each side of the jawbone. The tongue and lymph nodes are also shown.

## Causes and risk factors for childhood salivary gland tumors

Salivary gland tumors in children are caused by certain changes to the way salivary gland cells function, especially how they grow and divide into new cells. Often, the exact cause of these cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Past treatment for cancer with chemotherapy or radiation therapy is a risk factor for childhood salivary gland tumors. Not every child with this risk factor will develop a salivary gland tumor. And it will develop in some children who don't have a known risk factor. Talk with your child's doctor if you think your child may be at risk.

## Symptoms of childhood salivary gland tumors

Children may not have symptoms of a salivary gland tumor until the tumor has grown bigger. It's important to check with your child's doctor if your child has:

- a lump near the ear, cheek, jaw, lip, or inside the mouth that may be painless
- numbness or weakness in the face
- pain in the face that does not go away

These symptoms may be caused by problems other than a salivary gland tumor. The only way to know is to see your child's doctor.

## Tests to diagnose childhood salivary gland tumors

If your child has symptoms that suggest a salivary gland tumor, the doctor will need to find out if these are due to a salivary gland tumor or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with a salivary gland tumor, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose salivary gland tumors in children may include:

### Magnetic resonance imaging (MRI)

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas of the body, such as the head and neck. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan of the head and neck. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of the inside of the head and neck.

Computed tomography (CT) scan of the head and neck; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of the inside of the head and neck.

### Ultrasound exam

An ultrasound exam uses high-energy sound waves (ultrasound) which bounce off internal tissue or organs, such as the pelvis, and make echoes. The echoes form a picture of body tissues called a sonogram.

### Biopsy

A biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for signs of cancer. Fine-needle aspiration biopsy is used to check for salivary gland cancer. During a fine-needle aspiration biopsy, tissue or fluid is removed using a thin needle.

## Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's tumor.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Who treats children with salivary gland tumors?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of salivary gland tumors. The pediatric oncologist works with other health care providers who are experts in treating children with cancer and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- pediatric surgeon
- radiation oncologist
- pathologist
- ear, nose, and throat specialist
- pediatric nurse specialist
- social worker
- rehabilitation specialist
- psychologist
- child-life specialist

## Treatment of childhood salivary gland tumors

There are different types of treatment for children and adolescents with salivary gland tumors. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the tumor is newly diagnosed or has come back.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child’s care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

Treatment of salivary gland tumors may include:

- Surgery to remove salivary gland tumors or salivary gland cancer is the most common treatment. If the parotid gland is removed during surgery, special care must be taken to avoid damage to the facial nerve. Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).
- Radiation therapy may be given after surgery for salivary gland cancer. Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Salivary gland cancer may be treated with external beam radiation therapy or internal radiation therapy if the cancer is likely to spread.
  - External beam radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.
  - Internal radiation therapy, also called brachytherapy, uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.
  Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).
- Targeted therapy (entrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/entrectinib) or larotrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate)) may be used to treat recurrent childhood salivary gland cancer. Recurrent salivary gland cancer is cancer that has come back after it has been treated. Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells. The doctor may suggest biomarker tests to help predict your child's response to certain targeted therapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment) and Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

## Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

## Prognosis and prognostic factors for childhood salivary gland tumors

If your child has been diagnosed with salivary gland cancer, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. The prognosis can be affected by whether the cancer has spread to lymph nodes or other parts of the body at the time of diagnosis and whether the cancer can be completely removed by surgery. The prognosis for salivary gland cancer in children is usually good.

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

## Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems, such as:
  - dry mouth
  - trouble seeing
  - numbness or weakness in the face
  - changes in the way the bones of the head and face grow
  - other changes in the child's appearance
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the possible late effects caused by some treatments. Learn more about Late Effects of Treatment for Childhood Cancer.

## Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the tumor may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the tumor has recurred (come back).

## Coping with your child's cancer

When a child has a tumor, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child’s treatment team and to people in your family and community for support. To learn more, see Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, see:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (https://curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood salivary gland tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Salivary Gland Tumors. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/patient/child/salivary-gland-treatment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).